# Childhood Non-Hodgkin Lymphoma Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood non-Hodgkin lymphoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## General Information About Childhood Non-Hodgkin Lymphoma

Key Points for This Section
- Childhood non-Hodgkin lymphoma is a cancer that forms in the lymph system, which is a part of the body's immune system.
- There are three major types of childhood non-Hodgkin lymphoma.
  - Aggressive mature B-cell non-Hodgkin lymphoma
  - Lymphoblastic lymphoma
  - Anaplastic large cell lymphoma
- Some types of non-Hodgkin lymphoma are rare in children.
- Having a weakened immune system increases the risk of NHL in children.
- Symptoms of childhood non-Hodgkin lymphoma include breathing problems and swollen lymph nodes.
- Tests that examine the body and lymph system are used to diagnose and stage childhood non-Hodgkin lymphoma.
- You may want to get a second opinion to confirm your child's cancer diagnosis.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Childhood non-Hodgkin lymphoma is a cancer that forms in the lymph system, which is a part of the body's immune system.

The immune system helps protect the body from infection and disease.

The lymph system is made up of:

- Lymph: Colorless, watery fluid that travels through the lymph vessels and carries lymphocytes (white blood cells).
  - B lymphocytes, also called B cells, make antibodies to help fight infection. Most types of non-Hodgkin lymphoma begin in B lymphocytes.
  - T lymphocytes, also called T cells, help B lymphocytes make the antibodies that help fight infection.
  - Natural killer cells, also called NK cells, attack cancer cells and viruses.
- Lymph vessels: A network of thin tubes that collect lymph from different parts of the body and return it to the bloodstream.
- Lymph nodes: Small, bean-shaped structures that filter lymph and store white blood cells that help fight infection and disease. Lymph nodes are found along a network of lymph vessels throughout the body. Groups of lymph nodes are found in the neck, underarm, mediastinum (the area between the lungs), abdomen, pelvis, and groin.
- Spleen: An organ that makes lymphocytes, stores red blood cells and lymphocytes, filters the blood, and destroys old blood cells. The spleen is on the left side of the abdomen near the stomach.
- Thymus: An organ in which T lymphocytes mature and multiply. The thymus is in the chest behind the breastbone.
- Tonsils: Two small masses of lymph tissue at the back of the throat. There is one tonsil on each side of the throat.
- Bone marrow: The soft, spongy tissue in the center of certain bones, such as the hip bone and breastbone. White blood cells, red blood cells, and platelets are made in the bone marrow.

The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph (clear, watery fluid) and lymphocytes (white blood cells) travel through the lymph vessels and into the lymph nodes where the lymphocytes destroy harmful substances. The lymph enters the bloodstream through a large vein near the heart.

Lymph system; drawing shows the tonsils, thymus, spleen, bone marrow, lymph vessels, and lymph nodes. One inset shows the inside structure of a lymph node and the attached lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node. Another inset shows a close up of bone marrow with blood cells.

Lymph tissue is also found in other parts of the body such as the stomach, thyroid gland, brain, and skin.

Non-Hodgkin lymphoma can begin in B lymphocytes, T lymphocytes, or natural killer cells.

There are two general types of lymphomas: Hodgkin lymphoma and non-Hodgkin lymphoma. This summary is about the treatment of childhood non-Hodgkin lymphoma. Learn more about Childhood Hodgkin Lymphoma Treatment.

Treatment of non-Hodgkin lymphoma is different for children and adults. For information about treatment of adults, see:

- Non-Hodgkin Lymphoma
- Primary CNS Lymphoma Treatment
- Mycosis Fungoides (Including Sezary Syndrome) Treatment

### There are three major types of childhood non-Hodgkin lymphoma.

The type of lymphoma is determined by how the cells look under a microscope. The three major types of childhood non-Hodgkin lymphoma are:

#### Aggressive mature B-cell non-Hodgkin lymphoma

Aggressive mature B-cell non-Hodgkin lymphomas include:

- Burkitt lymphoma: Burkitt lymphoma is an aggressive (fast-growing) cancer that develops from B lymphocytes and is most common in children, adolescents, and young adults. It may form in the abdomen, Waldeyer's ring, testicles, bone, bone marrow, skin, or central nervous system (CNS).
  Burkitt lymphoma has been linked to infection with the Epstein-Barr virus (EBV). Burkitt lymphoma is more common in White people than in Hispanic people. Burkitt lymphoma is diagnosed when a sample of tissue is checked and a certain change to the MYC gene is found.
- Diffuse large B-cell lymphoma: Diffuse large B-cell lymphoma is the most common type of non-Hodgkin lymphoma. It is a type of B-cell non-Hodgkin lymphoma that grows quickly in the lymph nodes. The spleen, liver, bone marrow, or other organs are also often affected. Diffuse large B-cell lymphoma occurs more often in adolescents than in children.
- Primary mediastinal B-cell lymphoma: A type of lymphoma that develops from B cells in the mediastinum (the area between the lungs). It may spread to nearby organs including the lungs and the sac around the heart. It may also spread to lymph nodes and distant organs including the kidneys. Primary mediastinal B-cell lymphoma occurs more often in older adolescents than in children.

#### Lymphoblastic lymphoma

Lymphoblastic lymphoma is a type of lymphoma that mainly affects T-cell lymphocytes. It usually forms in the mediastinum (the area between the lungs). This causes trouble breathing, wheezing, trouble swallowing, or swelling of the head and neck. It may spread to lymph nodes, bone, bone marrow, skin, the CNS, abdominal organs, and other areas. Lymphoblastic lymphoma is a lot like acute lymphoblastic leukemia (ALL).

#### Anaplastic large cell lymphoma

Anaplastic large cell lymphoma is a type of lymphoma that mainly affects T-cell lymphocytes. It usually forms in the lymph nodes, skin, or bone, and sometimes forms in the gastrointestinal tract, lung, tissue that covers the lungs, and muscle. Patients with anaplastic large cell lymphoma have a receptor, called CD30, on the surface of their T cells. In many children, anaplastic large cell lymphoma is marked by changes in the ALK gene that makes a protein called anaplastic lymphoma kinase. A pathologist checks for these cell and gene changes to help diagnose anaplastic large cell lymphoma.

### Some types of non-Hodgkin lymphoma are rare in children.

Some types of childhood non-Hodgkin lymphoma are less common. These include:

- Pediatric-type follicular lymphoma: In children, follicular lymphoma occurs most often in males. It is more likely to be found in one area and does not spread to other places in the body. It usually forms in the tonsils and lymph nodes in the neck, but may also form in the testicles, kidney, gastrointestinal tract, and parotid gland.
- Marginal zone lymphoma: Marginal zone lymphoma is a type of lymphoma that tends to grow and spread slowly and is usually found at an early stage. It may be found in the lymph nodes or in areas outside the lymph nodes. Marginal zone lymphoma found outside the lymph nodes in children is called mucosa-associated lymphoid tissue (MALT) lymphoma. MALT may be linked to Helicobacter pylori infection of the gastrointestinal tract and Chlamydophila psittaci infection of the conjunctival membrane which lines the eye. Marginal zone lymphoma is rare in children and adults.
- Primary central nervous system (CNS) lymphoma: Primary CNS lymphoma is extremely rare in children. Most primary CNS lymphoma is diffuse large B-cell lymphoma.
- Peripheral T-cell lymphoma: Peripheral T-cell lymphoma is an aggressive (fast-growing) non-Hodgkin lymphoma that begins in mature T lymphocytes. Other types of peripheral T-cell lymphoma include mature T-cell/natural killer-cell lymphoma, extranodal NK/T-cell lymphoma, and gamma-delta hepatosplenic T-cell lymphoma. Peripheral T-cell lymphoma is rare in children.
- Cutaneous T-cell lymphoma: Cutaneous T-cell lymphoma begins in the skin and can cause the skin to thicken or form a tumor. It is very rare in children but is more common in adolescents and young adults. There are different types of cutaneous T-cell lymphoma, such as cutaneous anaplastic large cell lymphoma, subcutaneous panniculitis-like T-cell lymphoma, gamma-delta T-cell lymphoma, mycosis fungoides, and lymphomatoid papulosis. Mycosis fungoides rarely occurs in children and adolescents.

### Having a weakened immune system increases the risk of NHL in children.

A risk factor is anything that increases the chance of getting a disease. Not every child with one or more of these risk factors will develop NHL. And it will develop in some children who don't have a known risk factor.

Some immune system problems may increase the risk of childhood NHL. These immune system problems include:

- being infected with the Epstein-Barr virus or HIV
- having a weakened immune system after a transplant or from medicines given after a transplant
- having certain inherited diseases (such as DNA repair defect syndromes, which include ataxia-telangiectasia, Nijmegen breakage syndrome, and constitutional mismatch repair deficiency)
- past treatment for cancer

If lymphoma or lymphoproliferative disease is linked to a weakened immune system from certain inherited diseases, HIV infection, a transplant, or medicines given after a transplant, the condition is called lymphoproliferative disease associated with immunodeficiency. The different types of lymphoproliferative disease associated with immunodeficiency include:

- lymphoproliferative disease associated with primary immunodeficiency
- HIV-associated non-Hodgkin lymphoma
- post-transplant lymphoproliferative disease
- lymphoproliferative disease from chemotherapy

Talk with your child's doctor if you think your child may be at risk.

### Symptoms of childhood non-Hodgkin lymphoma include breathing problems and swollen lymph nodes.

The symptoms of childhood non-Hodgkin lymphoma depend on the where the cancer forms in the body. It's important to check with your child's doctor if your child has:

- trouble breathing
- wheezing
- coughing
- high-pitched breathing sounds
- swelling of the head, neck, upper body, or arms
- trouble swallowing
- painless swelling of the lymph nodes in the neck, underarm, stomach, or groin
- painless lump or swelling in a testicle
- fever for no known reason
- weight loss for no known reason
- drenching night sweats
- pain or swelling in the abdomen
- weakness, numbness, or pain in the back or legs
- a change in bowel or bladder control
- bone or joint pain
- fatigue

These symptoms may be caused by problems other than non-Hodgkin lymphoma. The only way to know is to see your child's doctor.

### Tests that examine the body and lymph system are used to diagnose and stage childhood non-Hodgkin lymphoma.

If your child has symptoms that suggest non-Hodgkin lymphoma, the doctor will need to find out if these are due to cancer or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family health history and do a physical exam. Depending on these results, they may recommend other tests. If your child is diagnosed with non-Hodgkin lymphoma, the results of the tests will help plan treatment.

The tests used to diagnose and stage non-Hodgkin lymphoma may include:

- Blood chemistry studies use a blood sample to measure the amounts of certain substances released into the blood by organs and tissues in the body, including electrolytes, lactate dehydrogenase (LDH), uric acid, blood urea nitrogen (BUN), creatinine, and liver function values. An unusual amount of a substance can be a sign of disease.
- Liver function tests measure the amounts of certain substances released into the blood by the liver. A higher-than-normal amount of a substance can be a sign of cancer.
- CT scan (CAT scan) uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body, such as the neck, chest, abdomen, and pelvis. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).
  Computed tomography (CT) scan. The child lies on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
  Computed tomography (CT) scan; drawing shows a child lying on a table that slides through the CT scanner, which takes a series of detailed x-ray pictures of areas inside the body.
- PET scan (positron emission tomography scan) uses a small amount of radioactive sugar (also called radioactive glucose) that is injected into a vein. The PET scanner rotates around the body and makes pictures of areas inside the body where the sugar is being used by the body. Cancer cells show up brighter in the pictures because they are more active and take up more sugar than normal cells do. Sometimes a PET scan and a CT scan are done at the same time.
  Positron emission tomography (PET) scan. The child lies on a table that slides through the PET scanner. The head rest and white strap help the child lie still. A small amount of radioactive glucose (sugar) is injected into the child's vein, and a scanner makes a picture of where the glucose is being used in the body. Cancer cells show up brighter in the picture because they take up more glucose than normal cells do.
  Positron emission tomography (PET) scan; drawing shows a child lying on table that slides through the PET scanner.
- Magnetic resonance imaging (MRI) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).
  Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.
  Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.
- Lumbar puncture is a procedure used to collect a sample of cerebrospinal fluid (CSF) from the spinal column. This is done by placing a needle between two bones in the spine and into the lining around the spinal cord to remove a sample of CSF. The sample of CSF is checked under a microscope for cancer.
  Lumbar puncture. A patient lies in a curled position on a table. After a small area on the lower back is numbed, a spinal needle (a long, thin needle) is inserted into the lower part of the spinal column to remove cerebrospinal fluid (CSF, shown in blue). The fluid may be sent to a laboratory for testing.
  Lumbar puncture; drawing shows a patient lying in a curled position on a table and a spinal needle (a long, thin needle) being inserted into the lower back. Inset shows a close-up of the spinal needle inserted into the cerebrospinal fluid (CSF) in the lower part of the spinal column.
- Chest x-ray is a type of radiation that can go through the body and make pictures of the organs and bones inside the chest.
- Ultrasound uses high-energy sound waves (ultrasound) that bounce off internal tissues or organs and make echoes. The echoes form a picture of body tissues called a sonogram.
  Abdominal ultrasound. An ultrasound transducer connected to a computer is pressed against the skin of the abdomen. The transducer bounces sound waves off internal organs and tissues to make echoes that form a sonogram (computer picture).
  Abdominal ultrasound; drawing shows a child lying on an exam table during an abdominal ultrasound procedure. A technician is shown pressing a transducer (a device that makes sound waves that bounce off tissues inside the body) against the skin of the abdomen. A computer screen shows a sonogram (picture).
- Biopsy is the removal of a sample of cells or tissue from the tumor so that pathologist can view it under a microscope to check for cancer.
  One of the following types of biopsies may be done:
  - excisional biopsy
  - incisional biopsy
  - core needle biopsy
  - fine-needle aspiration (FNA) biopsy

The procedure used to remove the sample of tissue depends on where the tumor is in the body:

- Bone marrow aspiration and biopsy removes bone marrow and a piece of bone by inserting a hollow needle into the hip bone or breastbone. A pathologist views the bone marrow and bone under a microscope to look for cancer.
  Bone marrow aspiration and biopsy. After a small area of skin is numbed, a bone marrow needle is inserted into the child’s hip bone. Samples of blood, bone, and bone marrow are removed for examination under a microscope.
  Bone marrow aspiration and biopsy; drawing shows a child lying face down on a table and a bone marrow needle being inserted into the right hip bone. An inset shows the bone marrow needle being inserted through the skin into the bone marrow of the hip bone.
- Mediastinoscopy is a surgical procedure to look at the organs, tissues, and lymph nodes between the lungs for abnormal areas. A cut (incision) is made at the top of the breastbone and a mediastinoscope is inserted into the chest. A mediastinoscope is a thin, tube-like instrument with a light and a lens for viewing. It also has a tool to remove tissue or lymph node samples, which are checked under a microscope for cancer.
- Anterior mediastinotomy is a surgical procedure to look at the organs and tissues between the lungs and between the breastbone and heart for abnormal areas. A cut (incision) is made next to the breastbone and a mediastinoscope is inserted into the chest. A mediastinoscope is a thin, tube-like instrument with a light and a lens for viewing. It also has a tool to remove tissue or lymph node samples, which are checked under a microscope for cancer. This is also called the Chamberlain procedure.
- Thoracentesis is the removal of fluid from the space between the lining of the chest and the lung, using a needle. A pathologist views the fluid under a microscope to look for cancer cells.

If cancer is found, the following tests may be done to study the cancer cells:

- Immunohistochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient's cells or tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type.
- Flow cytometry measures the number of cells in a sample, the percentage of live cells in a sample, and certain characteristics of the cells, such as size, shape, and the presence of tumor (or other) markers on the cell surface. The cells from a sample of a patient's blood, bone marrow, or other tissue are stained with a fluorescent dye, placed in a fluid, and then passed one at a time through a beam of light. The test results are based on how the cells that were stained with the fluorescent dye react to the beam of light. This test is used to help diagnose and manage certain types of cancers, such as leukemia and lymphoma.
- Cytogenetic analysis checks the chromosomes of cells in a sample of bone marrow, blood, tumor, or other tissue for broken, missing, rearranged, or extra chromosomes. Changes in certain chromosomes may be a sign of cancer. Cytogenetic analysis is used to help diagnose cancer, plan treatment, or find out how well treatment is working.
- FISH (fluorescence in situ hybridization) looks at and counts genes or chromosomes in cells and tissues. Pieces of DNA that contain fluorescent dyes are made in the laboratory and added to a sample of a patient's cells or tissues. When these dyed pieces of DNA attach to certain genes or areas of chromosomes in the sample, they light up when viewed under a fluorescent microscope. The FISH test is used to help diagnose cancer and help plan treatment.
- Immunophenotyping uses antibodies to identify cancer cells based on the types of antigens or markers on the surface of the cells. This test is used to help diagnose specific types of lymphoma.

### You may want to get a second opinion to confirm your child's cancer diagnosis.

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, visit Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

If your child has been diagnosed with non-Hodgkin lymphoma, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis depends on:

- the type of lymphoma
- where the cancer is in the body at diagnosis
- the stage of the cancer
- whether there are certain changes in the chromosomes
- the type of initial treatment
- whether the lymphoma responded to initial treatment
- your child's age and general health

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

## Stages of Childhood Non-Hodgkin Lymphoma

Key Points for This Section
- After childhood non-Hodgkin lymphoma has been diagnosed, tests are done to find out if cancer cells have spread within the lymph system or to other parts of the body.
- The following stages are used for childhood non-Hodgkin lymphoma:
  - Stage I
  - Stage II
  - Stage III
  - Stage IV
- Sometimes childhood non-Hodgkin lymphoma does not respond to treatment or recurs (comes back) after treatment.

### After childhood non-Hodgkin lymphoma has been diagnosed, tests are done to find out if cancer cells have spread within the lymph system or to other parts of the body.

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. It's important to know the stage of non-Hodgkin lymphoma to plan the best treatment.

For a description of the tests and procedures used to diagnose non-Hodgkin lymphoma, see General Information.

### The following stages are used for childhood non-Hodgkin lymphoma:

#### Stage I

Stage I childhood non-Hodgkin lymphoma. Cancer is found in one group of lymph nodes or one area outside the lymph nodes, but no cancer is found in the abdomen or mediastinum (area between the lungs).

Stage I childhood non-Hodgkin lymphoma; drawing shows cancer in one group of lymph nodes. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Lymphoma cells containing cancer are shown in the lymph node.

In stage I childhood non-Hodgkin lymphoma, cancer is found:

- in one group of lymph nodes; or
- in one area outside the lymph nodes.

No cancer is found in the abdomen or mediastinum (area between the lungs).

#### Stage II

Stage II childhood non-Hodgkin lymphoma. Cancer is found in one area outside the lymph nodes and in nearby lymph nodes (a); or in two or more areas above (b) or below (c) the diaphragm; or cancer started in the stomach, appendix, or intestines (d) and can be removed by surgery.

Stage II childhood non-Hodgkin lymphoma; drawing shows cancer in lymph node groups above and below the diaphragm, in the liver, and in the appendix. The colon and small intestine are also shown. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Lymphoma cells containing cancer are shown in the lymph node.

In stage II childhood non-Hodgkin lymphoma, cancer is found:

- in one area outside the lymph nodes and in nearby lymph nodes; or
- in two or more areas either above or below the diaphragm, and may have spread to nearby lymph nodes; or
- to have started in the stomach or intestines and can be completely removed by surgery. Cancer may have spread to certain nearby lymph nodes.

#### Stage III

Stage III childhood non-Hodgkin lymphoma. Cancer is found in at least one area above and below the diaphragm (a); or cancer started in the chest (b); or cancer started in the abdomen and spread throughout the abdomen (c); or in the area around the spine (not shown).

Stage III childhood non-Hodgkin lymphoma; drawing shows cancer in lymph node groups above and below the diaphragm, in the chest, and throughout the abdomen in the liver, spleen, small intestines, and appendix. The colon is also shown. An inset shows a lymph node with a lymph vessel, an artery, and a vein. Lymphoma cells containing cancer are shown in the lymph node.

In stage III childhood non-Hodgkin lymphoma, cancer is found:

- in at least one area above the diaphragm and in at least one area below the diaphragm; or
- to have started in the chest; or
- to have started in the abdomen and spread throughout the abdomen and cannot be completely removed by surgery; or
- in the area around the spine.

#### Stage IV

Stage IV childhood non-Hodgkin lymphoma. Cancer is found in the bone marrow, brain, or cerebrospinal fluid (CSF). Cancer may also be found in other parts of the body.

Stage IV childhood non-Hodgkin lymphoma; drawing shows the brain, spinal cord, and cerebrospinal fluid in and around the brain and spinal cord. An inset shows cancer in the bone marrow.

In stage IV childhood non-Hodgkin lymphoma, cancer is found in the bone marrow, brain, or cerebrospinal fluid. Cancer may also be found in other parts of the body.

### Sometimes childhood non-Hodgkin lymphoma does not respond to treatment or recurs (comes back) after treatment.

Refractory non-Hodgkin lymphoma is cancer that does not respond to initial treatment.

Recurrent non-Hodgkin lymphoma is cancer that has come back after treatment. It may come back in the lymph system or in other parts of the body.

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for children with non-Hodgkin lymphoma.
- Children with non-Hodgkin lymphoma should have their treatment planned by a team of doctors who are experts in treating childhood cancer.
- The following types of treatment may be used:
  - Surgery
  - Chemotherapy
  - Radiation therapy
  - Stem cell transplant
  - Targeted therapy
  - Other drug therapy
  - Phototherapy
  - Watchful waiting
  - Immunotherapy
- Treatment for childhood non-Hodgkin lymphoma may cause side effects.
- Patients may want to think about taking part in a clinical trial.
- Follow-up care may be needed.

### There are different types of treatment for children with non-Hodgkin lymphoma.

You and your child's care team will work together to decide treatment. Many factors will be considered, such as where the cancer is located, the type of non-Hodgkin lymphoma, whether the cancer is newly diagnosed or has come back, and your child's age and overall health.

Your child's treatment plan will include information about the tumor, the goals of treatment, treatment options, and possible side effects. It will be helpful for you to talk with your child's care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### Children with non-Hodgkin lymphoma should have their treatment planned by a team of doctors who are experts in treating childhood cancer.

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment of non-Hodgkin lymphoma. The pediatric oncologist works with other health care providers who are experts in treating children with cancer and also specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- radiation oncologist
- pediatric hematologist
- pediatric surgeon
- pediatric nurse specialist
- rehabilitation specialist
- psychologist
- social worker

### The following types of treatment may be used:

#### Surgery

Surgery may be done to remove as much of the tumor as possible for some types of childhood non-Hodgkin lymphoma. After the doctor removes all the cancer that can be seen at the time of surgery, patients may be given chemotherapy to kill any cancer cells that are left. Treatment given after the surgery, to lower the risk that the cancer will come back, is called adjuvant therapy.

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cells or stops them from dividing. Chemotherapy may be given alone or with other types of treatment.

Chemotherapy for childhood non-Hodgkin lymphoma is taken by mouth or injected into a vein. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body. Chemotherapy for childhood non-Hodgkin lymphoma is also placed directly into the cerebrospinal fluid (intrathecal chemotherapy), an organ, or a body cavity such as the abdomen. When given this way, the drugs mainly affect cancer cells in those areas.

Intrathecal chemotherapy may be used to treat childhood non-Hodgkin lymphoma that has spread, or may spread, to the brain. When used to lessen the chance cancer will spread to the brain, it is called CNS prophylaxis. Intrathecal chemotherapy is given in addition to chemotherapy by mouth or vein. Higher than usual doses of chemotherapy may also be used as CNS prophylaxis.

Intrathecal chemotherapy. Anticancer drugs are injected into the intrathecal space, which is the space that holds the cerebrospinal fluid (CSF, shown in blue). There are two different ways to do this. One way, shown in the top part of the figure, is to inject the drugs into an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). The other way, shown in the bottom part of the figure, is to inject the drugs directly into the CSF in the lower part of the spinal column, after a small area on the lower back is numbed.

Intrathecal chemotherapy; drawing shows the cerebrospinal fluid (CSF) in the brain and spinal cord, and an Ommaya reservoir (a dome-shaped container that is placed under the scalp during surgery; it holds the drugs as they flow through a small tube into the brain). Top section shows a syringe and needle injecting anticancer drugs into the Ommaya reservoir. Bottom section shows a syringe and needle injecting anticancer drugs directly into the cerebrospinal fluid in the lower part of the spinal column.

Chemotherapy drugs used alone or in combination to treat non-Hodgkin lymphoma in children include:

- asparaginase (https://www.cancer.gov/about-cancer/treatment/drugs/asparaginase-erwinia-chrysanthemi)
- carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
- cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
- cytarabine (https://www.cancer.gov/about-cancer/treatment/drugs/cytarabine)
- dexamethasone (https://www.cancer.gov/about-cancer/treatment/drugs/dexamethasone) (steroid)
- doxorubicin (https://www.cancer.gov/about-cancer/treatment/drugs/doxorubicinhydrochloride)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- idarubicin (https://www.cancer.gov/about-cancer/treatment/drugs/idarubicinhydrochloride)
- ifosfamide (https://www.cancer.gov/about-cancer/treatment/drugs/ifosfamide)
- methotrexate (https://www.cancer.gov/about-cancer/treatment/drugs/methotrexate-sodium)
- prednisone (https://www.cancer.gov/about-cancer/treatment/drugs/prednisone) (steroid)
- vinblastine (https://www.cancer.gov/about-cancer/treatment/drugs/vinblastinesulfate)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)

Other chemotherapy drugs not listed here may also be used.

The way the chemotherapy is given depends on the type and stage of the cancer being treated.

Learn more about Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer. External radiation therapy may be used to treat childhood non-Hodgkin lymphoma that has spread, or may spread, to the brain and spinal cord. It may also be used to treat cutaneous T-cell lymphoma (mycosis fungoides).

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Stem cell transplant

High doses of chemotherapy are given to kill cancer cells. This treatment destroys healthy cells, including blood-forming cells. Stem cell transplant is a treatment to replace the blood-forming cells. Stem cells (immature blood cells) are removed from the blood or bone marrow of the patient or a donor and are frozen and stored. After the patient completes chemotherapy, the stored stem cells are thawed and given to the patient through an infusion. These reinfused stem cells grow into (and restore) the body's blood cells. The donor stem cells may also find and kill any cancer cells left in the body.

Donor stem cell transplant. (Step 1): Four to five days before donor stem cell collection, the donor receives a medicine to increase the number of stem cells circulating through their bloodstream (not shown). The blood-forming stem cells are then collected from the donor through a large vein in their arm. The blood flows through an apheresis machine that removes the stem cells. The rest of the blood is returned to the donor through a vein in their other arm. (Step 2): The patient receives chemotherapy to kill cancer cells and prepare their body for the donor stem cells. The patient may also receive radiation therapy (not shown). (Step 3): The patient receives an infusion of the donor stem cells.

Donor stem cell transplant; (Panel 1): Drawing of stem cells being collected from a donor's bloodstream using an apheresis machine. Blood is removed from a vein in the donor's arm and flows through the machine where the stem cells are removed. The rest of the blood is then returned to the donor through a vein in their other arm. (Panel 2): Drawing of a health care provider giving a patient an infusion of chemotherapy through a catheter in the patient's chest. The chemotherapy is given to kill cancer cells and prepare the patient's body for the donor stem cells. (Panel 3): Drawing of a patient receiving an infusion of the donor stem cells through a catheter in the chest.

#### Targeted therapy

Targeted therapy uses drugs or other substances to block the action of specific enzymes, proteins, or other molecules involved in the growth and spread of cancer cells. Types of targeted therapy used to treat non-Hodgkin lymphoma in children include:

- brentuximab vedotin (https://www.cancer.gov/about-cancer/treatment/drugs/brentuximabvedotin)
- crizotinib (https://www.cancer.gov/about-cancer/treatment/drugs/crizotinib)
- denileukin diftitox (https://www.cancer.gov/about-cancer/treatment/drugs/denileukindiftitox-cxdl)
- pembrolizumab (https://www.cancer.gov/about-cancer/treatment/drugs/pembrolizumab)
- rituximab (https://www.cancer.gov/about-cancer/treatment/drugs/rituximab)

Learn more about Targeted Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/targeted-therapies).

#### Other drug therapy

Retinoids are drugs related to vitamin A. Retinoid therapy with bexarotene is used to treat several types of cutaneous T-cell lymphoma.

Steroids are hormones made naturally in the body. They can also be made in a laboratory and used as drugs. Steroid therapy that is applied to the skin is used to treat cutaneous T-cell lymphoma. Dexamethasone and prednisone are steroids used with other drugs to treat certain types of lymphoma.

Antibiotics are drugs used to treat infections and cancer caused by bacteria or other microorganisms. Antibiotics have been used to treat mucosa-associated lymphoid tissue (MALT) lymphoma. Treatment with antibiotic therapy has been mostly studied in adults.

#### Phototherapy

Phototherapy uses a drug and a certain type of laser light to kill cancer cells. A drug that is not active until it is exposed to light is injected into a vein. The drug collects more in cancer cells than in normal cells. For cancer in the skin, laser light is shined onto the skin and the drug becomes active and kills the cancer cells. Phototherapy is used in the treatment of cutaneous T-cell lymphoma.

#### Watchful waiting

Watchful waiting is closely monitoring a patient's condition without giving any treatment until signs or symptoms appear or change.

#### Immunotherapy

Immunotherapy helps a person's immune system fight cancer. Types of immunotherapy include:

- CAR T-cell therapy changes the patient's T cells (a type of immune system cell) so they will attack certain proteins on the surface of cancer cells. T cells are taken from the patient and special receptors are added to their surface in the laboratory. The changed cells are called chimeric antigen receptor (CAR) T cells. The CAR T cells are grown in the laboratory and given to the patient by infusion. The CAR T cells multiply in the patient's blood and attack cancer cells. CAR T-cell therapy is being studied in the treatment of Burkitt lymphoma and diffuse large B-cell lymphoma that has not responded to treatment or has recurred (come back).
  CAR T-cell therapy. A type of treatment in which a patient’s T cells (a type of immune cell) are changed in the laboratory so they will bind to cancer cells and kill them. Blood from a vein in the patient’s arm flows through a tube to an apheresis machine (not shown), which removes the white blood cells, including the T cells, and sends the rest of the blood back to the patient. Then, the gene for a special receptor called a chimeric antigen receptor (CAR) is inserted into the T cells in the laboratory. Millions of the CAR T cells are grown in the laboratory and then given to the patient by infusion. The CAR T cells are able to bind to an antigen on the cancer cells and kill them.
  CAR T-cell therapy; drawing of blood being removed from a vein in a patient’s arm to get T cells. Also shown is a special receptor called a chimeric antigen receptor (CAR) being made in the laboratory; the gene for CAR is inserted into the T cells and then millions of CAR T cells are grown. Drawing also shows the CAR T cells being given to the patient by infusion and binding to antigens on the cancer cells and killing them.
- Cyclosporine A is used in combination with steroids to treat subcutaneous panniculitic T-cell lymphoma.

Learn more about Immunotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/immunotherapy).

### Treatment for childhood non-Hodgkin lymphoma may cause side effects.

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of cancer treatment may include:

- physical problems, including problems with the heart, bones, and fertility
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer), such as brain tumors, acute myeloid leukemia, and myelodysplastic syndrome

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Patients may want to think about taking part in a clinical trial.

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Follow-up care may be needed.

As your child goes through treatment, they will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed or if the cancer has recurred (come back).

## Treatment Options for Childhood Non-Hodgkin Lymphoma

### Burkitt lymphoma

#### Treatment of Burkitt lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of newly diagnosed Burkitt lymphoma may include:

- surgery to remove as much of the tumor as possible, followed by combination chemotherapy
- combination chemotherapy with or without targeted therapy (rituximab)

#### Treatment of recurrent or refractory Burkitt lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of recurrent or refractory Burkitt lymphoma may include:

- combination chemotherapy with or without targeted therapy (rituximab)
- targeted therapy (rituximab), combination chemotherapy, and dexamethasone
- high-dose chemotherapy with stem cell transplant with the patient's own cells or cells from a donor
- CAR T-cell therapy

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Diffuse large B-cell lymphoma

#### Treatment of diffuse large B-cell lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of newly diagnosed diffuse large B-cell lymphoma may include:

- surgery to remove as much of the tumor as possible, followed by combination chemotherapy
- combination chemotherapy with or without targeted therapy (rituximab)

#### Treatment of recurrent or refractory diffuse large B-cell lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of recurrent or refractory diffuse large B-cell lymphoma may include:

- combination chemotherapy with or without targeted therapy (rituximab)
- targeted therapy (rituximab), combination chemotherapy, and dexamethasone
- stem cell transplant with the patient's own cells or cells from a donor
- CAR T-cell therapy

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Primary Mediastinal B-cell Lymphoma

#### Treatment of primary mediastinal B-cell lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of newly diagnosed primary mediastinal B-cell lymphoma may include combination chemotherapy, prednisone, targeted therapy (rituximab), and sometimes radiation therapy.

#### Treatment of recurrent or refractory primary mediastinal B-cell lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of recurrent or refractory primary mediastinal B-cell lymphoma may include targeted therapy (pembrolizumab).

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Lymphoblastic Lymphoma

#### Treatment of lymphoblastic lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Lymphoblastic lymphoma may be classified as the same disease as acute lymphoblastic leukemia (ALL). Treatment of lymphoblastic lymphoma may include:

- combination chemotherapy
- CNS prophylaxis with radiation therapy or intrathecal chemotherapy may also be given to keep cancer from spreading to the brain or spinal cord

#### Treatment of recurrent or refractory lymphoblastic lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of recurrent or refractory lymphoblastic lymphoma may include:

- chemotherapy
- stem cell transplant with cells from a donor

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Anaplastic Large Cell Lymphoma

#### Treatment of anaplastic large cell lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of anaplastic large cell lymphoma may include:

- surgery followed by combination chemotherapy
- combination chemotherapy with or without prednisone
- intrathecal and combination chemotherapy, for patients with cancer in the brain or spinal cord

#### Treatment of recurrent or refractory anaplastic large cell lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of recurrent or refractory anaplastic large cell lymphoma may include:

- chemotherapy
- targeted therapy (brentuximab vedotin or crizotinib)
- chemotherapy followed by a stem cell transplant with the patient's own cells or cells from a donor

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Lymphoproliferative Disease Associated With Immunodeficiency in Children

#### Treatment of lymphoproliferative disease associated with primary immunodeficiency

For information about the treatments listed below, see Treatment Option Overview.

Treatment of lymphoproliferative disease in children and adolescents with weakened immune systems may include:

- chemotherapy with or without targeted therapy (rituximab)
- stem cell transplant with cells from a donor may be used to treat the primary immunodeficiency and to decrease the risk of cancer coming back

#### Treatment of non-Hodgkin lymphoma associated with DNA repair defect syndromes

For information about the treatments listed below, see Treatment Option Overview.

Treatment of non-Hodgkin lymphoma associated with DNA repair defect syndromes in children may include chemotherapy.

#### Treatment of HIV-associated non-Hodgkin lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment with highly active antiretroviral therapy or HAART (a combination of antiretroviral drugs) lowers the risk of non-Hodgkin lymphoma in patients infected with HIV.

Treatment of HIV-related non-Hodgkin lymphoma (NHL) in children may include chemotherapy with or without targeted therapy (rituximab).

#### Treatment of post-transplant lymphoproliferative disease

For information about the treatments listed below, see Treatment Option Overview.

Treatment of post-transplant lymphoproliferative disease may include:

- Surgery to remove the tumor. If possible, lower doses of immunosuppressive drugs after a stem cell or organ transplant may be given.
- Targeted therapy (rituximab).
- Chemotherapy with or without targeted therapy (rituximab).

### Rare NHL Occurring in Children

#### Treatment of pediatric-type follicular lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of follicular lymphoma in children may include:

- surgery
- combination chemotherapy with or without targeted therapy (rituximab)

For children whose cancer has certain changes in the genes, treatment is similar to that given to adults with follicular lymphoma. For information about the treatment of follicular lymphoma in adults, visit Non-Hodgkin Lymphoma.

#### Treatment of marginal zone lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of marginal zone lymphoma (including mucosa-associated lymphoid tissue [MALT] lymphoma) in children may include:

- surgery
- radiation therapy
- targeted therapy (rituximab) with or without chemotherapy
- antibiotic therapy, for MALT lymphoma

#### Treatment of primary CNS lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of primary CNS lymphoma in children may include chemotherapy and targeted therapy (rituximab).

#### Treatment of peripheral T-cell lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of peripheral T-cell lymphoma in children may include:

- chemotherapy
- radiation therapy
- stem cell transplant with the patient's own cells or cells from a donor

#### Treatment of cutaneous T-cell lymphoma

For information about the treatments listed below, see Treatment Option Overview.

Treatment of subcutaneous panniculitis-like T-cell lymphoma in children may include:

- watchful waiting
- immunotherapy using steroids with or without cyclosporine A or ruxolitinib
- targeted therapy (denileukin diftitox)
- combination chemotherapy
- retinoid therapy
- stem cell transplant

Treatment of cutaneous anaplastic large cell lymphoma may include surgery, radiation therapy, or both.

#### Treatment of mycosis fungoides

For information about the treatments listed below, see Treatment Option Overview.

In children, treatment of mycosis fungoides may include:

- steroids applied to the skin
- retinoid therapy
- radiation therapy
- phototherapy (light therapy using ultraviolet B radiation)

#### Treatment of lymphomatoid papulosis

For information about the treatments listed below, see Treatment Option Overview.

In children, treatment of lymphomatoid papulosis may include:

- watchful waiting
- steroids applied to the skin
- phototherapy (light therapy using ultraviolet B radiation)
- low doses of chemotherapy (methotrexate)

## To Learn More About Childhood Non-Hodgkin Lymphoma

For more information from the National Cancer Institute about childhood non-Hodgkin lymphoma, visit:

- Drugs Approved for Non-Hodgkin Lymphoma (https://www.cancer.gov/about-cancer/treatment/drugs/non-hodgkin)
- Stem Cell Transplants in Cancer Treatment (https://www.cancer.gov/about-cancer/treatment/types/stem-cell-transplant)

For more childhood cancer information and other general cancer resources, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Late Effects of Treatment for Childhood Cancer
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood non-Hodgkin lymphoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Non-Hodgkin Lymphoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/lymphoma/patient/child-nhl-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389294]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).